# Paranasal Sinus and Nasal Cavity Cancer Treatment (PDQ®)

Patient Version

This PDQ cancer information summary has current information about the treatment of paranasal sinus and nasal cavity cancer. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Adult Treatment Editorial Board.

## General Information About Paranasal Sinus and Nasal Cavity Cancer

Key Points for This Section
- Paranasal sinus and nasal cavity cancer is a disease in which malignant (cancer) cells form in the tissues of the paranasal sinuses and nasal cavity.
- Different types of cells in the paranasal sinus and nasal cavity may become malignant.
- Being exposed to certain chemicals or dust in the workplace can increase the risk of paranasal sinus and nasal cavity cancer.
- Signs and symptoms of paranasal sinus and nasal cavity cancer include sinus problems and nosebleeds.
- Tests that examine the sinuses and nasal cavity are used to diagnose paranasal sinus and nasal cavity cancer.
- Certain factors affect prognosis (chance of recovery) and treatment options.

### Paranasal sinus and nasal cavity cancer is a disease in which malignant (cancer) cells form in the tissues of the paranasal sinuses and nasal cavity.

Paranasal sinuses

"Paranasal" means near the nose. The para sinuses are hollow, air-filled spaces in the bones around the nose. The sinuses are lined with cells that make mucus, which keeps the inside of the nose from drying out during breathing.

Anatomy of the paranasal sinuses (spaces between the bones around the nose).

Anatomy of the paranasal sinuses; drawing shows front and side views of the frontal sinus, ethmoid sinus, maxillary sinus, and sphenoid sinus. The nasal cavity and pharynx (throat) are also shown.

There are several para sinuses named after the bones that surround them:

- The frontal sinuses are in the lower forehead above the nose.
- The maxillary sinuses are in the cheekbones on either side of the nose.
- The ethmoid sinuses are beside the upper nose, between the eyes.
- The sphenoid sinuses are behind the nose, in the center of the skull.

Nasal cavity

The nose opens into the nasal cavity, which is divided into two nasal passages. Air moves through these passages during breathing. The nasal cavity lies above the bone that forms the roof of the mouth and curves down at the back to join the throat. The area just inside the nostrils is called the nasal vestibule. A small area of special cells in the roof of each nasal passage sends signals to the brain to give the sense of smell.

Together the paranasal sinuses and the nasal cavity filter and warm the air, and make it moist before it goes into the lungs. The movement of air through the sinuses and other parts of the respiratory system help make sounds for talking.

Paranasal sinus and nasal cavity cancer is a type of head and neck cancer.

### Different types of cells in the paranasal sinus and nasal cavity may become malignant.

The most common type of paranasal sinus and nasal cavity cancer is squamous cell carcinoma. This type of cancer forms in the thin, flat cells lining the inside of the paranasal sinuses and the nasal cavity.

Other types of paranasal sinus and nasal cavity cancer include:

- Melanomas: Cancer that starts in cells called melanocytes, the cells that give skin its natural color.
- Sarcomas: Cancer that starts in muscle or connective tissue.
- Inverting papillomas: Benign tumors that form inside the nose. A small number of these change into cancer.
- Midline granulomas: Cancer of tissues in the middle part of the face.

### Being exposed to certain chemicals or dust in the workplace can increase the risk of paranasal sinus and nasal cavity cancer.

Anything that increases a person's chance of getting a disease is called a risk factor. Not every person with one or more of these risk factors will develop paranasal sinus and nasal cavity cancer, and it will develop in people who don't have any known risk factors. Talk with your doctor if you think you may be at risk. Risk factors for paranasal sinus and nasal cavity cancer include:

- Being exposed to certain workplace chemicals or dust, such as those found in the following jobs:
  - Furniture-making.
  - Sawmill work.
  - Woodworking (carpentry).
  - Shoemaking.
  - Metal-plating.
  - Flour mill or bakery work.
- Being infected with human papillomavirus (HPV).
- Being male and older than 40 years.
- Smoking.

### Signs and symptoms of paranasal sinus and nasal cavity cancer include sinus problems and nosebleeds.

These and other signs and symptoms may be caused by paranasal sinus and nasal cavity cancer or by other conditions. There may be no signs or symptoms in the early stages. Signs and symptoms may appear as the tumor grows. Check with your doctor if you have:

- Blocked sinuses that do not clear, or sinus pressure.
- Headaches or pain in the sinus areas.
- A runny nose.
- Nosebleeds.
- A lump or sore inside the nose that does not heal.
- A lump on the face or roof of the mouth.
- Numbness or tingling in the face.
- Swelling or other trouble with the eyes, such as double vision or the eyes pointing in different directions.
- Pain in the upper teeth, loose teeth, or dentures that no longer fit well.
- Pain or pressure in the ear.

### Tests that examine the sinuses and nasal cavity are used to diagnose paranasal sinus and nasal cavity cancer.

In addition to asking about your personal and family health history and doing a physical exam, your doctor may perform the following tests and procedures:

- Physical exam of the nose, face, and neck: An exam in which the doctor looks into the nose with a small, long-handled mirror to check for abnormal areas and checks the face and neck for lumps or swollen lymph nodes.
- X-rays of the head and neck: An x-ray is a type of energy beam that can go through the body and onto film, making a picture of areas inside the body.
- MRI (magnetic resonance imaging): A procedure that uses a magnet, radio waves, and a computer to make a series of detailed pictures of areas inside the body. This procedure is also called nuclear magnetic resonance imaging (NMRI).
- CT scan (CAT scan): A procedure that makes a series of detailed pictures of areas inside the body, taken from different angles. The pictures are made by a computer linked to an x-ray machine. A dye may be injected into a vein or swallowed to help the organs or tissues show up more clearly. This procedure is also called computed tomography, computerized tomography, or computerized axial tomography.
- Biopsy: The removal of cells or tissues so they can be viewed under a microscope by a pathologist to check for signs of cancer. There are three types of biopsy:
  - Fine-needle aspiration (FNA) biopsy: The removal of tissue or fluid using a thin needle.
  - Incisional biopsy: The removal of part of an area of tissue that doesn’t look normal.
  - Excisional biopsy: The removal of an entire area of tissue that doesn’t look normal.
- Nasoscopy: A procedure to look inside the nose for abnormal areas. A nasoscope is inserted into the nose. A nasoscope is a thin, tube-like instrument with a light and a lens for viewing. A special tool on the nasoscope may be used to remove samples of tissue. The tissues samples are viewed under a microscope by a pathologist to check for signs of cancer.
- Laryngoscopy: A procedure in which the doctor checks the larynx (voice box) with a mirror or a laryngoscope to check for abnormal areas. A laryngoscope is a thin, tube-like instrument with a light and a lens for viewing the inside of the throat and voice box. It may also have a tool to remove tissue samples, which are checked under a microscope for signs of cancer.

### Certain factors affect prognosis (chance of recovery) and treatment options.

The prognosis and treatment options depend on:

- Where the tumor is in the paranasal sinus or nasal cavity and whether it has spread.
- The size of the tumor.
- The type of cancer.
- The patient's age and general health.
- Whether the cancer has just been diagnosed or has recurred (come back).

Paranasal sinus and nasal cavity cancers often have spread by the time they are diagnosed and are hard to cure. After treatment, a lifetime of frequent and careful follow-up is important because there is an increased risk of developing a second kind of cancer in the head or neck.

## Stages of Paranasal Sinus and Nasal Cavity Cancer

Key Points for This Section
- After paranasal sinus and nasal cavity cancer has been diagnosed, tests are done to find out if cancer cells have spread within the paranasal sinuses and nasal cavity or to other parts of the body.
- There are three ways that cancer spreads in the body.
- Cancer may spread from where it began to other parts of the body.
- There is no standard staging system for cancer of the sphenoid and frontal sinuses.
- The following stages are used for maxillary sinus cancer:
  - Stage 0 (carcinoma in situ)
  - Stage I
  - Stage II
  - Stage III
  - Stage IV
- The following stages are used for nasal cavity and ethmoid sinus cancer:
  - Stage 0 (carcinoma in situ)
  - Stage I
  - Stage II
  - Stage III
  - Stage IV
- After surgery, the stage of the cancer may change and more treatment may be needed.
- Paranasal sinus and nasal cavity cancer can recur (come back) after it has been treated.

### After paranasal sinus and nasal cavity cancer has been diagnosed, tests are done to find out if cancer cells have spread within the paranasal sinuses and nasal cavity or to other parts of the body.

The process used to find out if cancer has spread within the paranasal sinuses and nasal cavity or to other parts of the body is called staging. The information gathered from the staging process determines the stage of the disease. It is important to know the stage in order to plan treatment. The following tests and procedures may be used in the staging process:

- Endoscopy: A procedure to look at organs and tissues inside the body to check for abnormal areas. An endoscope is inserted through an opening in the body, such as the nose or mouth. An endoscope is a thin, tube-like instrument with a light and a lens for viewing. It may also have a tool to remove tissue or lymph node samples, which are checked under a microscope for signs of disease.
- CT scan (CAT scan): A procedure that makes a series of detailed pictures of areas inside the body, taken from different angles. The pictures are made by a computer linked to an x-ray machine. A dye may be injected into a vein or swallowed to help the organs or tissues show up more clearly. This procedure is also called computed tomography, computerized tomography, or computerized axial tomography.
- Chest x-ray: An x-ray of the organs and bones inside the chest. An x-ray is a type of energy beam that can go through the body and onto film, making a picture of areas inside the body.
- MRI (magnetic resonance imaging) with gadolinium: A procedure that uses a magnet, radio waves, and a computer to make a series of detailed pictures of areas inside the body. Sometimes a substance called gadolinium is injected into a vein. The gadolinium collects around the cancer cells so they show up brighter in the picture. This procedure is also called nuclear magnetic resonance imaging (NMRI).
- PET scan (positron emission tomography scan): A procedure to find malignant tumor cells in the body. A small amount of radioactive glucose (sugar) is injected into a vein. The PET scanner rotates around the body and makes a picture of where glucose is being used in the body. Malignant tumor cells show up brighter in the picture because they are more active and take up more glucose than normal cells do.
- Bone scan: A procedure to check if there are rapidly dividing cells, such as cancer cells, in the bone. A very small amount of radioactive material is injected into a vein and travels through the bloodstream. The radioactive material collects in the bones with cancer and is detected by a scanner.

### There are three ways that cancer spreads in the body.

Cancer can spread through tissue, the lymph system, and the blood:

- Tissue. The cancer spreads from where it began by growing into nearby areas.
- Lymph system. The cancer spreads from where it began by getting into the lymph system. The cancer travels through the lymph vessels to other parts of the body.
- Blood. The cancer spreads from where it began by getting into the blood. The cancer travels through the blood vessels to other parts of the body.

### Cancer may spread from where it began to other parts of the body.

When cancer spreads to another part of the body, it is called metastasis. Cancer cells break away from where they began (the primary tumor) and travel through the lymph system or blood.

- Lymph system. The cancer gets into the lymph system, travels through the lymph vessels, and forms a tumor (metastatic tumor) in another part of the body.
- Blood. The cancer gets into the blood, travels through the blood vessels, and forms a tumor (metastatic tumor) in another part of the body.

The metastatic tumor is the same type of cancer as the primary tumor. For example, if nasal cavity cancer spreads to the lung, the cancer cells in the lung are actually nasal cavity cancer cells. The disease is metastatic nasal cavity cancer, not lung cancer.

metastasis: how cancer spreads

Many cancer deaths are caused when cancer moves from the original tumor and spreads to other tissues and organs. This is called metastatic cancer. This animation shows how cancer cells travel from the place in the body where they first formed to other parts of the body.

YouTube (https://www.youtube.com/watch?v=fQwar_-QdiQ)

### There is no standard staging system for cancer of the sphenoid and frontal sinuses.

The staging described below for the maxillary and ethmoid sinuses and the nasal cavity is only used for patients who have not had lymph nodes in the neck removed and checked for signs of cancer.

Tumor sizes are often measured in centimeters (cm) or inches. Common food items that can be used to show tumor size in cm include: a pea (1 cm), a peanut (2 cm), a grape (3 cm), a walnut (4 cm), a lime (5 cm or 2 inches), an egg (6 cm), a peach (7 cm), and a grapefruit (10 cm or 4 inches).

Drawing shows different sizes of a tumor in centimeters (cm) compared to the size of a pea (1 cm), a peanut (2 cm), a grape (3 cm), a walnut (4 cm), a lime (5 cm), an egg (6 cm), a peach (7 cm), and a grapefruit (10 cm). Also shown is a 10-cm ruler and a 4-inch ruler.

### The following stages are used for maxillary sinus cancer:

#### Stage 0 (carcinoma in situ)

In stage 0, abnormal cells are found in the mucous membranes lining the maxillary sinus. These abnormal cells may become cancer and spread into nearby normal tissue. Stage 0 is also called carcinoma in situ.

#### Stage I

In stage I, cancer has formed in the mucous membranes of the maxillary sinus.

#### Stage II

In stage II, cancer has spread to bone around the maxillary sinus, including the roof of the mouth and the nose, but not to bone at the back of the maxillary sinus or the part of the sphenoid bone behind the upper jaw.

#### Stage III

In stage III, cancer has spread to any of the following:

- The bone at the back of the maxillary sinus.
- The tissues under the skin.
- The part of the eye socket near the nose or the bottom of the eye socket.
- The area behind the cheek bone.
- The ethmoid sinus.

or

Cancer is found in the maxillary sinus and may have spread to any of the following:

- The bones around the maxillary sinus, including the roof of the mouth and the nose.
- The tissues under the skin.
- The part of the eye socket near the nose or the bottom of the eye socket.
- The area behind the cheek bone.
- The ethmoid sinus.

Cancer has also spread to one lymph node on the same side of the neck as the cancer, and the lymph node is 3 centimeters or smaller.

#### Stage IV

Stage IV is divided into stages IVA, IVB, and IVC.

Stage IVA

In stage IVA, cancer has spread to any of the following:

- The eye.
- The skin of the cheek.
- The part of the sphenoid bone behind the upper jaw.
- The area behind the upper jaw.
- The bone between the eyes.
- The sphenoid or frontal sinuses.

Cancer may have also spread to one lymph node on the same side of the neck as the cancer, and the lymph node is 3 centimeters or smaller.

or

Cancer is found in the maxillary sinus and may have spread to any of the following:

- The bones around the maxillary sinus, including the roof of the mouth and the nose.
- The bone between the eyes.
- The tissues under the skin.
- The skin of the cheek.
- The eye, the part of the eye socket near the nose, or the bottom of the eye socket.
- The area behind the cheek bone.
- The part of the sphenoid bone behind the upper jaw.
- The area behind the upper jaw.
- The ethmoid, sphenoid, or frontal sinuses.

Cancer has also spread to one of the following:

- one lymph node on the same side of the neck as the cancer and the lymph node is larger than 3 centimeters but not larger than 6 centimeters; or
- more than one lymph node on the same side of the neck as the cancer and the lymph nodes are not larger than 6 centimeters; or
- lymph nodes on the opposite side of the neck as the cancer or on both sides of the neck, and the lymph nodes are not larger than 6 centimeters.

Stage IVB

In stage IVB, cancer has spread to any of the following:

- The area behind the eye.
- The brain.
- The middle parts of the skull.
- The nerves that begin in the brain and go to the face, neck, and other parts of the brain (cranial nerves).
- The upper part of the throat behind the nose.
- The base of the skull near the spinal cord.

Cancer may have also spread to one or more lymph nodes of any size, anywhere in the neck.

or

Cancer may be found anywhere in or near the maxillary sinus. Cancer has spread to a lymph node that is larger than 6 centimeters or has spread through the outside covering of a lymph node into nearby connective tissue.

Stage IVC

In stage IVC, cancer may be found anywhere in or near the maxillary sinus, may have spread to lymph nodes, and has spread to organs far away from the maxillary sinus, such as the lungs.

### The following stages are used for nasal cavity and ethmoid sinus cancer:

#### Stage 0 (carcinoma in situ)

In stage 0, abnormal cells are found in the mucous membranes lining the nasal cavity or ethmoid sinus. These abnormal cells may become cancer and spread into nearby normal tissue. Stage 0 is also called carcinoma in situ.

#### Stage I

In stage I, cancer has formed and is found in only one area of either the nasal cavity or the ethmoid sinus and may have spread into bone.

#### Stage II

In stage II, cancer is found in two areas of either the nasal cavity or the ethmoid sinus that are near each other, or cancer has spread to an area next to the sinuses. Cancer may also have spread into bone.

#### Stage III

In stage III, cancer has spread to any of the following:

- The part of the eye socket near the nose or the bottom of the eye socket.
- The maxillary sinus.
- The roof of the mouth.
- The bone between the eyes.

or

Cancer is found in the nasal cavity or ethmoid sinus and may have spread to any of the following:

- The part of the eye socket near the nose or the bottom of the eye socket.
- The maxillary sinus.
- The roof of the mouth.
- The bone between the eyes.

Cancer has also spread to one lymph node on the same side of the neck as the cancer, and the lymph node is 3 centimeters or smaller.

#### Stage IV

Stage IV is divided into stages IVA, IVB, and IVC.

Stage IVA

In stage IVA, cancer has spread to any of the following:

- The eye.
- The skin of the nose or cheek.
- The front parts of the skull.
- The part of the sphenoid bone behind the upper jaw.
- The sphenoid or frontal sinuses.

Cancer may have also spread to one lymph node on the same side of the neck as the cancer, and the lymph node is 3 centimeters or smaller.

or

Cancer is found in the nasal cavity or ethmoid sinus and may have spread to any of the following:

- The eye, the part of the eye socket near the nose, or the bottom of the eye socket.
- The skin of the nose or cheek.
- The front parts of the skull.
- The part of the sphenoid bone behind the upper jaw.
- The sphenoid or frontal sinuses.

Cancer has also spread to one of the following:

- one lymph node on the same side of the neck as the cancer and the lymph node is larger than 3 centimeters but not larger than 6 centimeters; or
- more than one lymph node on the same side of the neck as the cancer and the lymph nodes are not larger than 6 centimeters; or
- lymph nodes on the opposite side of the neck as the cancer or on both sides of the neck, and the lymph nodes are not larger than 6 centimeters.

Stage IVB

In stage IVB, cancer has spread to any of the following:

- The area behind the eye.
- The brain.
- The middle parts of the skull.
- The nerves that begin in the brain and go to the face, neck, and other parts of the brain (cranial nerves).
- The upper part of the throat behind the nose.
- The base of the skull near the spinal cord.

Cancer may have also spread to one or more lymph nodes of any size, anywhere in the neck.

or

Cancer may be found anywhere in or near the nasal cavity and ethmoid sinus. Cancer has spread to a lymph node that is larger than 6 centimeters or has spread through the outside covering of a lymph node into nearby connective tissue.

Stage IVC

In stage IVC, cancer may be found anywhere in or near the nasal cavity and ethmoid sinus, may have spread to lymph nodes, and has spread to organs far away from the nasal cavity and ethmoid sinus, such as the lungs.

### After surgery, the stage of the cancer may change and more treatment may be needed.

If the cancer is removed by surgery, a pathologist will examine a sample of the cancer tissue under a microscope. Sometimes, the pathologist’s review results in a change to the stage of the cancer and more treatment is needed after surgery.

### Paranasal sinus and nasal cavity cancer can recur (come back) after it has been treated.

The cancer may come back in the paranasal sinuses and nasal cavity or in other parts of the body.

## Treatment Option Overview

Key Points for This Section
- There are different types of treatment for patients with paranasal sinus and nasal cavity cancer.
- Patients with paranasal sinus and nasal cavity cancer should have their treatment planned by a team of doctors with expertise in treating head and neck cancer.
- The following types of treatment are used:
  - Surgery
  - Radiation therapy
  - Chemotherapy
- New types of treatment are being tested in clinical trials.
- Treatment for paranasal sinus and nasal cavity cancer may cause side effects.
- Patients may want to think about taking part in a clinical trial.
- Patients can enter clinical trials before, during, or after starting their cancer treatment.
- Follow-up tests may be needed.

### There are different types of treatment for patients with paranasal sinus and nasal cavity cancer.

Different types of treatment are available for patients with paranasal sinus and nasal cavity cancer. Some treatments are standard (the currently used treatment), and some are being tested in clinical trials. A treatment clinical trial is a research study meant to help improve current treatments or obtain information on new treatments for patients with cancer. When clinical trials show that a new treatment is better than the standard treatment, the new treatment may become the standard treatment. Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

### Patients with paranasal sinus and nasal cavity cancer should have their treatment planned by a team of doctors with expertise in treating head and neck cancer.

Treatment will be overseen by a medical oncologist, a doctor who specializes in treating people with cancer. The medical oncologist works with other doctors who are experts in treating patients with head and neck cancer and who specialize in certain areas of medicine and rehabilitation. Patients who have paranasal sinus and nasal cavity cancer may need special help adjusting to breathing problems or other side effects of the cancer and its treatment. If a large amount of tissue or bone around the paranasal sinuses or nasal cavity is taken out, plastic surgery may be done to repair or rebuild the area. The treatment team may include the following specialists:

- Radiation oncologist.
- Neurologist.
- Oral surgeon or head and neck surgeon.
- Plastic surgeon.
- Dentist.
- Nutritionist.
- Speech and language pathologist.
- Rehabilitation specialist.

### The following types of treatment are used:

#### Surgery

Surgery (removing the cancer in an operation) is a common treatment for all stages of paranasal sinus and nasal cavity cancer. A doctor may remove the cancer and some of the healthy tissue and bone around the cancer. If the cancer has spread, the doctor may remove lymph nodes and other tissues in the neck.

After the doctor removes all the cancer that can be seen at the time of the surgery, some patients may be given chemotherapy or radiation therapy after surgery to kill any cancer cells that are left. Treatment given after the surgery, to lower the risk that the cancer will come back, is called adjuvant therapy.

#### Radiation therapy

Radiation therapy is a cancer treatment that uses high-energy x-rays or other types of radiation to kill cancer cells or keep them from growing. There are two types of radiation therapy:

- External radiation therapy uses a machine outside the body to send radiation toward the area of the body with cancer. The total dose of radiation therapy is sometimes divided into several smaller, equal doses delivered over a period of several days. This is called fractionation.
  External-beam radiation therapy of the head and neck. A machine is used to aim high-energy radiation at the cancer. The machine can rotate around the patient, delivering radiation from many different angles to provide highly conformal treatment. A mesh mask helps keep the patient’s head and neck from moving during treatment. Small ink marks are put on the mask. The ink marks are used to line up the radiation machine in the same position before each treatment.
  External-beam radiation therapy of the head and neck; drawing shows a patient lying on a table under a machine that is used to aim high-energy radiation at the cancer. An inset shows a mesh mask that helps keep the patient's head and neck from moving during treatment. The mask has pieces of white tape with small ink marks on it. The ink marks are used to line up the radiation machine in the same position before each treatment.
- Internal radiation therapy uses a radioactive substance sealed in needles, seeds, wires, or catheters that are placed directly into or near the cancer.

The way the radiation therapy is given depends on the type and stage of the cancer being treated. External and internal radiation therapy are used to treat paranasal sinus and nasal cavity cancer.

External radiation therapy to the thyroid or the pituitary gland may change the way the thyroid gland works. The thyroid hormone levels in the blood may be tested before and after treatment.

#### Chemotherapy

Chemotherapy is a cancer treatment that uses drugs to stop the growth of cancer cells, either by killing the cells or by stopping them from dividing. When chemotherapy is taken by mouth or injected into a vein or muscle, the drugs enter the bloodstream and can reach cancer cells throughout the body (systemic chemotherapy). When chemotherapy is placed directly into the cerebrospinal fluid, an organ, or a body cavity such as the abdomen, the drugs mainly affect cancer cells in those areas (regional chemotherapy). Combination chemotherapy is treatment using more than one anticancer drug.

The way the chemotherapy is given depends on the type and stage of the cancer being treated.

For more information, see Drugs Approved for Head and Neck Cancer (https://www.cancer.gov/about-cancer/treatment/drugs/head-neck). (Paranasal sinus and nasal cavity cancer is a type of head and neck cancer.)

### New types of treatment are being tested in clinical trials.

Information about clinical trials is available from the NCI website (https://www.cancer.gov/research/participate/clinical-trials).

### Treatment for paranasal sinus and nasal cavity cancer may cause side effects.

For information about side effects caused by treatment for cancer, visit our Side Effects (https://www.cancer.gov/about-cancer/treatment/side-effects) page.

### Patients may want to think about taking part in a clinical trial.

For some patients, taking part in a clinical trial may be the best treatment choice. Clinical trials are part of the cancer research process. Clinical trials are done to find out if new cancer treatments are safe and effective or better than the standard treatment.

Many of today's standard treatments for cancer are based on earlier clinical trials. Patients who take part in a clinical trial may receive the standard treatment or be among the first to receive a new treatment.

Patients who take part in clinical trials also help improve the way cancer will be treated in the future. Even when clinical trials do not lead to effective new treatments, they often answer important questions and help move research forward.

### Patients can enter clinical trials before, during, or after starting their cancer treatment.

Some clinical trials only include patients who have not yet received treatment. Other trials test treatments for patients whose cancer has not gotten better. There are also clinical trials that test new ways to stop cancer from recurring (coming back) or reduce the side effects of cancer treatment.

Clinical trials are taking place in many parts of the country. Information about clinical trials supported by NCI can be found on NCI’s clinical trials search (https://www.cancer.gov/research/participate/clinical-trials-search) webpage. Clinical trials supported by other organizations can be found on the ClinicalTrials.gov website.

### Follow-up tests may be needed.

As you go through treatment, you will have follow-up tests or check-ups. Some tests that were done to diagnose or stage the cancer may be repeated to see how well the treatment is working. Decisions about whether to continue, change, or stop treatment may be based on the results of these tests.

Some of the tests will continue to be done from time to time after treatment has ended. The results of these tests can show if your condition has changed or if the cancer has recurred (come back).

## Treatment of Stage I Paranasal Sinus and Nasal Cavity Cancer

For information about the treatments listed below, see the Treatment Option Overview section.

Treatment of stage I paranasal sinus and nasal cavity cancer depends on where cancer is found in the paranasal sinuses and nasal cavity:

- If cancer is in the maxillary sinus, treatment is usually surgery with or without radiation therapy.
- If cancer is in the ethmoid sinus, treatment is usually radiation therapy and/or surgery.
- If cancer is in the sphenoid sinus, treatment is the same as for nasopharyngeal cancer, usually radiation therapy. For more information, see Nasopharyngeal Cancer Treatment.
- If cancer is in the nasal cavity, treatment is usually surgery and/or radiation therapy.
- For inverting papillomas, treatment is usually surgery with or without radiation therapy.
- For melanomas and sarcomas, treatment is usually surgery with or without radiation therapy and chemotherapy.
- For midline granulomas, treatment is usually radiation therapy.
- If cancer is in the nasal vestibule, treatment is usually surgery or radiation therapy.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Treatment of Stage II Paranasal Sinus and Nasal Cavity Cancer

For information about the treatments listed below, see the Treatment Option Overview section.

Treatment of stage II paranasal sinus and nasal cavity cancer depends on where cancer is found in the paranasal sinuses and nasal cavity:

- If cancer is in the maxillary sinus, treatment is usually high-dose radiation therapy before or after surgery.
- If cancer is in the ethmoid sinus, treatment is usually radiation therapy and/or surgery.
- If cancer is in the sphenoid sinus, treatment is the same as for nasopharyngeal cancer, usually radiation therapy with or without chemotherapy. For more information, see Nasopharyngeal Cancer Treatment.
- If cancer is in the nasal cavity, treatment is usually surgery and/or radiation therapy.
- For inverting papillomas, treatment is usually surgery with or without radiation therapy.
- For melanomas and sarcomas, treatment is usually surgery with or without radiation therapy and chemotherapy.
- For midline granulomas, treatment is usually radiation therapy.
- If cancer is in the nasal vestibule, treatment is usually surgery or radiation therapy.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Treatment of Stage III Paranasal Sinus and Nasal Cavity Cancer

For information about the treatments listed below, see the Treatment Option Overview section.

Treatment of stage III paranasal sinus and nasal cavity cancer depends on where cancer is found in the paranasal sinuses and nasal cavity.

If cancer is in the maxillary sinus, treatment may include:

- High-dose radiation therapy before or after surgery.
- A clinical trial of fractionated radiation therapy before or after surgery.

If cancer is in the ethmoid sinus, treatment may include:

- Surgery followed by radiation therapy.
- A clinical trial of combination chemotherapy before surgery or radiation therapy.
- A clinical trial of combination chemotherapy after surgery or other cancer treatment.

If cancer is in the sphenoid sinus, treatment is the same as for nasopharyngeal cancer, usually radiation therapy with or without chemotherapy. For more information, see Nasopharyngeal Cancer Treatment.

If cancer is in the nasal cavity, treatment may include:

- Surgery and/or radiation therapy.
- Chemotherapy and radiation therapy.
- A clinical trial of combination chemotherapy before surgery or radiation therapy.
- A clinical trial of combination chemotherapy after surgery or other cancer treatment.

For inverting papillomas, treatment is usually surgery with or without radiation therapy.

For melanomas and sarcomas, treatment may include:

- Surgery.
- Radiation therapy.
- Surgery, radiation therapy, and chemotherapy.

For midline granulomas, treatment is usually radiation therapy.

If cancer is in the nasal vestibule, treatment may include:

- External radiation therapy and/or internal radiation therapy with or without surgery.
- A clinical trial of combination chemotherapy before surgery or radiation therapy.
- A clinical trial of combination chemotherapy after surgery or other cancer treatment.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Treatment of Stage IV Paranasal Sinus and Nasal Cavity Cancer

For information about the treatments listed below, see the Treatment Option Overview section.

Treatment of stage IV paranasal sinus and nasal cavity cancer depends on where cancer is found in the paranasal sinuses and nasal cavity.

If cancer is in the maxillary sinus, treatment may include:

- High-dose radiation therapy with or without surgery.
- A clinical trial of fractionated radiation therapy.
- A clinical trial of chemotherapy before surgery or radiation therapy.
- A clinical trial of chemotherapy after surgery or other cancer treatment.
- A clinical trial of chemotherapy and radiation therapy.

If cancer is in the ethmoid sinus, treatment may include:

- Radiation therapy before or after surgery.
- Chemotherapy and radiation therapy.
- A clinical trial of chemotherapy before surgery or radiation therapy.
- A clinical trial of chemotherapy after surgery or other cancer treatment.
- A clinical trial of chemotherapy and radiation therapy.

If cancer is in the sphenoid sinus, treatment is the same as for nasopharyngeal cancer, usually radiation therapy with or without chemotherapy. For more information, see Nasopharyngeal Cancer Treatment.

If cancer is in the nasal cavity, treatment may include:

- Surgery and/or radiation therapy.
- Chemotherapy and radiation therapy.
- A clinical trial of combination chemotherapy before surgery or radiation therapy.
- A clinical trial of combination chemotherapy after surgery or other cancer treatment.

For inverting papillomas, treatment is usually surgery with or without radiation therapy.

For melanomas and sarcomas, treatment may include:

- Surgery.
- Radiation therapy.
- Chemotherapy.

For midline granulomas, treatment is usually radiation therapy.

If cancer is in the nasal vestibule, treatment may include:

- External radiation therapy and/or internal radiation therapy with or without surgery.
- A clinical trial of chemotherapy before surgery or radiation therapy.
- A clinical trial of chemotherapy after surgery or other cancer treatment.
- A clinical trial of chemotherapy and radiation therapy.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Treatment of Recurrent Paranasal Sinus and Nasal Cavity Cancer

For information about the treatments listed below, see the Treatment Option Overview section.

Treatment of recurrent paranasal sinus and nasal cavity cancer depends on where cancer is found in the paranasal sinuses and nasal cavity.

If cancer is in the maxillary sinus, treatment may include:

- Surgery followed by radiation therapy.
- Radiation therapy followed by surgery.
- Chemotherapy as palliative therapy to relieve symptoms and improve the quality of life.
- A clinical trial of chemotherapy.

If cancer is in the ethmoid sinus, treatment may include:

- Surgery and/or radiation therapy.
- Chemotherapy as palliative therapy to relieve symptoms and improve the quality of life.
- A clinical trial of chemotherapy.

If cancer is in the sphenoid sinus, treatment is the same as for nasopharyngeal cancer and may include radiation therapy with or without chemotherapy. For more information, see Nasopharyngeal Cancer Treatment.

If cancer is in the nasal cavity, treatment may include:

- Surgery and/or radiation therapy.
- Chemotherapy as palliative therapy to relieve symptoms and improve the quality of life.
- A clinical trial of chemotherapy.

For inverting papillomas, treatment is usually surgery with or without radiation therapy.

For melanomas and sarcomas, treatment may include:

- Surgery.
- Chemotherapy as palliative therapy to relieve symptoms and improve the quality of life.

For midline granulomas, treatment is usually radiation therapy.

If cancer is in the nasal vestibule, treatment may include:

- Surgery and/or radiation therapy.
- Chemotherapy as palliative therapy to relieve symptoms and improve the quality of life.
- A clinical trial of chemotherapy.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## To Learn More About Paranasal Sinus and Nasal Cavity Cancer

For more information from the National Cancer Institute about paranasal sinus and nasal cavity cancer, see:

- Head and Neck Cancer Home Page (https://www.cancer.gov/types/head-and-neck)
- Oral Complications of Cancer Therapies
- Drugs Approved for Head and Neck Cancer (https://www.cancer.gov/about-cancer/treatment/drugs/head-neck)
- Head and Neck Cancers (https://www.cancer.gov/types/head-and-neck/head-neck-fact-sheet)
- Tobacco (https://www.cancer.gov/about-cancer/causes-prevention/risk/tobacco) (includes help with quitting)

For general cancer information and other resources from the National Cancer Institute, visit:

- About Cancer (https://www.cancer.gov/about-cancer)
- Cancer Staging (https://www.cancer.gov/about-cancer/diagnosis-staging/staging)
- Chemotherapy and You: Support for People With Cancer (https://www.cancer.gov/publications/patient-education/chemo-and-you)
- Radiation Therapy and You: Support for People With Cancer (https://www.cancer.gov/publications/patient-education/radiation-therapy-and-you)
- Coping with Cancer (https://www.cancer.gov/about-cancer/coping)
- Questions to Ask Your Doctor about Cancer (https://www.cancer.gov/about-cancer/coping/questions)
- For Survivors, Caregivers, and Advocates (https://cancercontrol.cancer.gov/ocs/resources/survivors.html)

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about the treatment of paranasal sinus and nasal cavity cancer. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Adult Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/adult-treatment).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Adult Treatment Editorial Board. PDQ Paranasal Sinus and Nasal Cavity Cancer Treatment. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/head-and-neck/patient/adult/paranasal-sinus-treatment-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389439]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).